# Myelodysplastic/Myeloproliferative Neoplasms Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of myelodysplastic/myeloproliferative neoplasms. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Myelodysplastic/Myeloproliferative Neoplasms (MDS/MPN)

### Disease Overview

The myelodysplastic/myeloproliferative neoplasms (MDS/MPN) are clonal myeloid disorders that have both dysplastic and proliferative features but are not properly classified as either myelodysplastic syndromes (MDS) or chronic myeloproliferative disorders (CMPD).[1-3] This category includes three major myeloid disorders: chronic myelomonocytic leukemia (CMML), juvenile myelomonocytic leukemia (JMML), and atypical chronic myeloid leukemia (aCML). Myeloid disease that shows features of both MDS and CMPD but does not meet the criteria for any of the three major MDS/MPN entities is designated as myelodysplastic/myeloproliferative neoplasm, unclassifiable (MDS/MPN-UC). The World Health Organization created the MDS/MPN category to provide a less restrictive view of myeloid disorders, which in some instances clearly overlap.[1-3]

### Incidence and Mortality

The etiology of MDS/MPN is not known. The incidence of MDS/MPN varies widely, ranging from approximately 3 per 100,000 individuals older than 60 years annually for CMML to as few as 0.13 per 100,000 children from birth to 14 years annually for JMML.[4] Reliable data concerning the incidence of aCML, a recently defined entity, are not available. The incidence of MDS/MPN-UC is unknown.

### Histopathology

The pathophysiology of MDS/MPN involves abnormalities in the regulation of myeloid pathways for cellular proliferation, maturation, and survival. Clinical symptoms result from the following complications:[5]

- Cytopenia(s).
- Dysplastic cells that function abnormally.
- Leukemic infiltration of various organ systems, especially the spleen and liver.
- General constitutional symptoms, such as fever and malaise.

Patients with MDS/MPN do not have a Philadelphia chromosome or BCR::ABL1 fusion gene.

An international consortium has proposed uniform response criteria to be used in clinical trials because of the spectrum of presentations ranging from the myelodysplastic to the myeloproliferative.[6]

### References

Arber DA, Orazi A, Hasserjian R, et al.: The 2016 revision to the World Health Organization classification of myeloid neoplasms and acute leukemia. Blood 127 (20): 2391-405, 2016.27069254
Vardiman JW, Thiele J, Arber DA, et al.: The 2008 revision of the World Health Organization (WHO) classification of myeloid neoplasms and acute leukemia: rationale and important changes. Blood 114 (5): 937-51, 2009.19357394
Loghavi S, Sui D, Wei P, et al.: Validation of the 2017 revision of the WHO chronic myelomonocytic leukemia categories. Blood Adv 2 (15): 1807-1816, 2018.30054307
Vardiman JW, Harris NL, Brunning RD: The World Health Organization (WHO) classification of the myeloid neoplasms. Blood 100 (7): 2292-302, 2002.12239137 22224355
Bain BJ: The relationship between the myelodysplastic syndromes and the myeloproliferative disorders. Leuk Lymphoma 34 (5-6): 443-9, 1999.10492067 99419816
Savona MR, Malcovati L, Komrokji R, et al.: An international consortium proposal of uniform response criteria for myelodysplastic/myeloproliferative neoplasms (MDS/MPN) in adults. Blood 125 (12): 1857-65, 2015.25624319

## Treatment of Chronic Myelomonocytic Leukemia

### Disease Overview

The World Health Organization (WHO) classifies chronic myelomonocytic leukemia (CMML) as a myelodysplastic/myeloproliferative neoplasm (MDS/MPN).[1] The WHO recognizes a dysplastic subtype and a proliferative subtype, with prognostic groups differentiated by the circulating white blood cell (WBC) count or the percentage of blasts in the bone marrow (higher percentage with worse prognosis).[2]

CMML is a clonal disorder of a bone marrow stem cell. Monocytosis is a major defining feature. CMML exhibits heterogenous clinical, hematological, and morphologic features, varying from predominantly myelodysplastic to predominantly myeloproliferative. Evolution to acute myeloid leukemia (AML) portends a particularly poor prognosis.[3]

CMML is characterized pathologically by:[4,5]

- Persistent monocytosis is greater than 1 × 10^9^/L in the peripheral blood.
- No Philadelphia chromosome or BCR::ABL1 fusion gene.
- No PDGFRA and PDGFRB rearrangement.
- Fewer than 20% blasts in the blood or bone marrow (including monoblasts/promonocytes).
- Dysplasia involving one or more myeloid lineages or, if myelodysplasia is absent or minimal, either an acquired clonal cytogenetic bone marrow abnormality or at least 3 months of persistent peripheral blood monocytosis, if all other causes are ruled out.

Clinical features of CMML include:[4,5]

- Fever, fatigue, night sweats, and weight loss. For more information, see Fatigue, Hot Flashes and Night Sweats, and Nutrition in Cancer Care.
- Infection.
- Bleeding caused by thrombocytopenia.
- Hepatomegaly (in some patients).
- Splenomegaly (in some patients).
- In patients with a WBC count that is within reference range or slightly decreased, clinical features may be identical to MDS.
- In patients with elevated WBC count, features are more like chronic myeloproliferative disorders, including more frequent splenomegaly and hepatomegaly.

The median age at diagnosis of CMML is 65 to 75 years with a male predominance of 1.5 to 3.1.[4,5] Because CMML is grouped with chronic myeloid leukemia in some epidemiologic surveys and with MDS in others, no reliable incidence data are available for CMML.[6] Although the specific etiology of CMML is unknown, exposure to occupational and environmental carcinogens, ionizing radiation, and cytotoxic agents has been associated in some cases.[6]

Morphologically, the disease is characterized by a persistent peripheral blood monocytosis (always >1 × 10^9^/L) that may exceed 80 × 10^9^/L with monocytes typically accounting for more than 10% of the WBCs.[4,5] Monocytes, though typically mature with an unremarkable morphology, can exhibit abnormal granulation, unusual nuclear lobation, or finely dispersed nuclear chromatin.[7] Fewer than 20% blasts are seen in the blood or bone marrow. Neutrophilia occurs in nearly 50% of patients with neutrophil precursors (e.g., promyelocytes and myelocytes) accounting for more than 10% of the WBCs.[8] Mild normocytic anemia is common. Moderate thrombocytopenia is often present. Bone marrow findings include:[4,5,9,10]

- Hypercellularity (75% of cases).
- Blast count less than 20%.
- Granulocytic proliferation (with dysgranulopoiesis).
- Monocytic proliferation, dyserythropoiesis (e.g., megaloblastic changes, abnormal nuclear contours, ringed sideroblasts, etc.).
- Micromegakaryocytes and/or megakaryocytes with abnormally lobated nuclei (as many as 80% of the cases).
- Fibrosis (30% of the cases).

Hepatosplenomegaly may be present.[4,5] Autoimmune phenomena, including pyoderma gangrenosum, vasculitis, and idiopathic thrombocytopenia have been observed in CMML.[11] Care should be taken to identify cases of CMML with eosinophilia, a subtype of CMML, because of its association with severe tissue damage secondary to eosinophil degranulation. In CMML with eosinophilia, all criteria for CMML are present, and the eosinophil count in the peripheral blood is more than 1.5 × 10^9^/L.[6]

Recurrent somatic mutations have been identified in most patients with CMML, including mutant signaling molecules (especially NRAS, KRAS, JAK2, and SETBP1), epigenetic regulators (especially TET2 and ASXL1), splicing factors (especially SRSF2), and transcription factors (especially RUNX1).[12-15] A CMML-specific prognostic scoring system can distinguish four risk groups based on the following factors:[16]

1. Red blood cell transfusion dependency.
2. WBC count at least 13 × 10^9^/L.
3. Bone marrow blasts at least 5%.
4. Genetic risk group based on cytogenetics (trisomy 8, ≥3 abnormalities on karyotype, or chromosome 7 abnormalities are high risk), and mutations of either ASXL1, NRAS, RUNX1, or SETBP1.

The best prognostic group has a median survival of more than 10 years with no leukemic evolution in the first decade of follow-up. The worst prognostic group has a median survival of 20 months with a 50% evolution to AML by 2 years.[16]

Prognostic factors associated with shorter survival include:[17,18]

- Low hemoglobin level.
- Low platelet count; high WBC, monocyte, and lymphocyte counts.
- Presence of circulating immature myeloid cells.
- High percentage of marrow blasts.
- Low percentage of marrow erythroid cells.
- Abnormal molecular genetic data.
- High levels of serum lactate dehydrogenase and beta-2-microglobulin.

Progression to acute leukemia occurs in approximately 15% to 20% of cases.[17,18]

CPSS-Mol is a CMML-specific prognostic scoring system that incorporates molecular genetic data, especially mutations in RUNX1, NRAS, SETBP1, and ASXL1. This system distinguishes low-risk disease with median survivals longer than 10 years from high-risk disease with median survivals of 2 to 4 years.[16]

### Treatment Overview

CMML is a diagnosis typically made after age 70 years. The clinical course of CMML ranges from indolent or smoldering disease to an aggressive disease progression culminating in severe cytopenias or evolution to acute leukemia. Assessment of the risk factors and the pace of disease over time may help to distinguish patients who require therapy from those who would be best managed with a watchful waiting approach. Asymptomatic patients at low risk of progression may be best served by forgoing therapy.[19,20]

#### Allogeneic stem cell transplant (SCT)

Patients with high-risk disease who are young enough and fit enough may undergo allogeneic SCT. This represents the only potential cure for CMML. Hypomethylating agents like azacitidine and decitabine are usually given prior to allogeneic SCT for cytoreduction or to ameliorate cytopenias.[21,22] Retrospective reports that included small numbers of patients with CMML (range, 12–80) who underwent allogeneic SCT reported recurrence rates of 20% to 40% and 5-year overall survival (OS) rates of approximately 20% to 30%.[23-28][Level of evidence C3]

A retrospective review of 1,114 patients with CMML diagnosed between 2000 and 2014 included 384 patients who underwent allogeneic SCT.[29] With a median follow-up of 51 to 78 months (in two data sets), allogeneic SCT in patients with low-risk CMML was detrimental, with a 5-year OS rates of 20% for patients who underwent allogeneic SCT and 42% for patients who did not undergo allogeneic SCT (P < .001).[29][Level of evidence C1] For patients with high-risk CMML, there was no statistically significant difference in 5-year OS rates among patients treated with or without allogeneic SCT (27% vs. 15%, respectively; P = .13).

#### Hypomethylating agents

Two randomized prospective clinical trials compared the hypomethylating agent, azacitidine, with best supportive care in patients with myelodysplastic syndromes (MDS). The trials involved large numbers of patients with MDS but also included small numbers of patients (fewer than 25) with CMML.[30,31] The overall response rates exceeded 60% for all patients who received azacitidine, but the data did not allow an assessment specifically for patients with CMML.[30,31][Level of evidence C3] Several phase II trials reported response rates of 30% to 60% for patients with CMML who received hypomethylating agents.[32-36] Azacitidine and decitabine may reverse cytopenias, cytoreduce elevated WBC counts, reduce splenic size, and improve clinical symptoms (like decreased appetite or itching).

#### Hydroxyurea

Hydroxyurea has been given for other diseases with chronic myeloproliferation, such as thrombocythemia and myelofibrosis. These applications suggest the use of hydroxyurea for CMML with leukocytosis, thrombocytosis, or splenomegaly.[37] In a randomized prospective clinical trial of 105 patients with CMML, hydroxyurea (up to 4 g/day) was compared with etoposide.[38] With a median follow-up of 11 months, the median OS was 20 months in patients who received hydroxyurea and 9 months in patients who received etoposide (P < .0001).[38][Level of evidence A1]

#### Hypomethylating agent versus hydroxyurea

In a prospective randomized trial, 170 patients with newly diagnosed advanced CMML received intravenous decitabine or hydroxyurea (1–4 g/day). With a median follow-up of 17.5 months, there was no statistically significant difference in event-free survival (12.1 months for patients who received decitabine and 10.3 months for patients who received hydroxyurea; hazard ratio, 0.83; 95% confidence interval [CI], 0.59–1.16; P = .27). There was also no statistically significant difference in median OS (16.3 months for patients who received decitabine and 21.9 months for patients who received hydroxyurea; P = .67).[39][Level of evidence A1] Although decitabine reduced CMML progression or transformation to AML by 38% compared with hydroxyurea, this was offset by a 55% increase in deaths that were not caused by progression (the deaths were usually related to infection). There are no data to suggest that systematic antibiotic prophylaxis would have helped the patients who received decitabine.

#### Other regimens

In a phase II trial, 13 hypomethylating agent–naive patients with high-risk CMML were treated with azacitidine or decitabine plus venetoclax. With a median follow-up of 14.1 months, the overall response rate was 85% (11 of 13 patients), including two with complete response and a median duration of response of 17.9 months.[40,41][Level of evidence C3] Six of these patients underwent subsequent allogeneic SCT.

A retrospective study included 21 patients with high-risk CMML who received cladribine plus low-dose cytarabine alternating with azacitidine or decitabine. The patients had an objective response rate of 33% (50% in patients with hypomethylating agent–naive CMML and 23% in patients with hypomethylating agent–failure CMML).[41][Level of evidence C3]

A phase I/II study of 23 patients with mostly high-risk MDS and greater than 5% marrow blast cells involved 10 patients with CMML. All patients received azacitidine plus venetoclax. With a median follow-up of 13.2 months, the overall response rate was 87% (95% CI, 66%–97%).[42][Level of evidence C3]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Orazi A, Germing U: The myelodysplastic/myeloproliferative neoplasms: myeloproliferative diseases with dysplastic features. Leukemia 22 (7): 1308-19, 2008.18480833
Arber DA, Orazi A, Hasserjian R, et al.: The 2016 revision to the World Health Organization classification of myeloid neoplasms and acute leukemia. Blood 127 (20): 2391-405, 2016.27069254
Germing U, Strupp C, Knipp S, et al.: Chronic myelomonocytic leukemia in the light of the WHO proposals. Haematologica 92 (7): 974-7, 2007.17606449
Onida F, Beran M: Chronic myelomonocytic leukemia: myeloproliferative variant. Curr Hematol Rep 3 (3): 218-26, 2004.15087071
Emanuel PD: Juvenile myelomonocytic leukemia and chronic myelomonocytic leukemia. Leukemia 22 (7): 1335-42, 2008.18548091
Aul C, Bowen DT, Yoshida Y: Pathogenesis, etiology and epidemiology of myelodysplastic syndromes. Haematologica 83 (1): 71-86, 1998.9542325 98203448
Kouides PA, Bennett JM: Morphology and classification of the myelodysplastic syndromes and their pathologic variants. Semin Hematol 33 (2): 95-110, 1996.8722681 96303400
Bennett JM, Catovsky D, Daniel MT, et al.: The chronic myeloid leukaemias: guidelines for distinguishing chronic granulocytic, atypical chronic myeloid, and chronic myelomonocytic leukaemia. Proposals by the French-American-British Cooperative Leukaemia Group. Br J Haematol 87 (4): 746-54, 1994.7986717 95078144
Michaux JL, Martiat P: Chronic myelomonocytic leukaemia (CMML)--a myelodysplastic or myeloproliferative syndrome? Leuk Lymphoma 9 (1-2): 35-41, 1993.8477199 93237810
Maschek H, Georgii A, Kaloutsi V, et al.: Myelofibrosis in primary myelodysplastic syndromes: a retrospective study of 352 patients. Eur J Haematol 48 (4): 208-14, 1992.1592101 92275062
Saif MW, Hopkins JL, Gore SD: Autoimmune phenomena in patients with myelodysplastic syndromes and chronic myelomonocytic leukemia. Leuk Lymphoma 43 (11): 2083-92, 2002.12533032 22420465
Meggendorfer M, Roller A, Haferlach T, et al.: SRSF2 mutations in 275 cases with chronic myelomonocytic leukemia (CMML). Blood 120 (15): 3080-8, 2012.22919025
Kosmider O, Gelsi-Boyer V, Ciudad M, et al.: TET2 gene mutation is a frequent and adverse event in chronic myelomonocytic leukemia. Haematologica 94 (12): 1676-81, 2009.19797729
Malcovati L, Papaemmanuil E, Ambaglio I, et al.: Driver somatic mutations identify distinct disease entities within myeloid neoplasms with myelodysplasia. Blood 124 (9): 1513-21, 2014.24970933
Patnaik MM, Itzykson R, Lasho TL, et al.: ASXL1 and SETBP1 mutations and their prognostic contribution in chronic myelomonocytic leukemia: a two-center study of 466 patients. Leukemia 28 (11): 2206-12, 2014.24695057
Elena C, Gallì A, Such E, et al.: Integrating clinical features and genetic lesions in the risk assessment of patients with chronic myelomonocytic leukemia. Blood 128 (10): 1408-17, 2016.27385790
Onida F, Kantarjian HM, Smith TL, et al.: Prognostic factors and scoring systems in chronic myelomonocytic leukemia: a retrospective analysis of 213 patients. Blood 99 (3): 840-9, 2002.11806985 21665804
Germing U, Kündgen A, Gattermann N: Risk assessment in chronic myelomonocytic leukemia (CMML). Leuk Lymphoma 45 (7): 1311-8, 2004.15359628
Hunter AM, Zhang L, Padron E: Current Management and Recent Advances in the Treatment of Chronic Myelomonocytic Leukemia. Curr Treat Options Oncol 19 (12): 67, 2018.30367269
Patnaik MM, Tefferi A: Chronic Myelomonocytic leukemia: 2020 update on diagnosis, risk stratification and management. Am J Hematol 95 (1): 97-115, 2020.31736132
Kongtim P, Popat U, Jimenez A, et al.: Treatment with Hypomethylating Agents before Allogeneic Stem Cell Transplant Improves Progression-Free Survival for Patients with Chronic Myelomonocytic Leukemia. Biol Blood Marrow Transplant 22 (1): 47-53, 2016.26343946
Sekeres MA, Othus M, List AF, et al.: Randomized Phase II Study of Azacitidine Alone or in Combination With Lenalidomide or With Vorinostat in Higher-Risk Myelodysplastic Syndromes and Chronic Myelomonocytic Leukemia: North American Intergroup Study SWOG S1117. J Clin Oncol 35 (24): 2745-2753, 2017.28486043
Elliott MA, Tefferi A, Hogan WJ, et al.: Allogeneic stem cell transplantation and donor lymphocyte infusions for chronic myelomonocytic leukemia. Bone Marrow Transplant 37 (11): 1003-8, 2006.16604096
Ocheni S, Kröger N, Zabelina T, et al.: Outcome of allo-SCT for chronic myelomonocytic leukemia. Bone Marrow Transplant 43 (8): 659-61, 2009.18997830
Krishnamurthy P, Lim ZY, Nagi W, et al.: Allogeneic haematopoietic SCT for chronic myelomonocytic leukaemia: a single-centre experience. Bone Marrow Transplant 45 (10): 1502-7, 2010.20098454
Eissa H, Gooley TA, Sorror ML, et al.: Allogeneic hematopoietic cell transplantation for chronic myelomonocytic leukemia: relapse-free survival is determined by karyotype and comorbidities. Biol Blood Marrow Transplant 17 (6): 908-15, 2011.20932924
Park S, Labopin M, Yakoub-Agha I, et al.: Allogeneic stem cell transplantation for chronic myelomonocytic leukemia: a report from the Societe Francaise de Greffe de Moelle et de Therapie Cellulaire. Eur J Haematol 90 (5): 355-64, 2013.23320648
Symeonidis A, van Biezen A, de Wreede L, et al.: Achievement of complete remission predicts outcome of allogeneic haematopoietic stem cell transplantation in patients with chronic myelomonocytic leukaemia. A study of the Chronic Malignancies Working Party of the European Group for Blood and Marrow Transplantation. Br J Haematol 171 (2): 239-246, 2015.26212516
Robin M, de Wreede LC, Padron E, et al.: Role of allogeneic transplantation in chronic myelomonocytic leukemia: an international collaborative analysis. Blood 140 (12): 1408-1418, 2022.35667047
Silverman LR, Demakos EP, Peterson BL, et al.: Randomized controlled trial of azacitidine in patients with the myelodysplastic syndrome: a study of the cancer and leukemia group B. J Clin Oncol 20 (10): 2429-40, 2002.12011120 22007249
Fenaux P, Mufti GJ, Hellstrom-Lindberg E, et al.: Efficacy of azacitidine compared with that of conventional care regimens in the treatment of higher-risk myelodysplastic syndromes: a randomised, open-label, phase III study. Lancet Oncol 10 (3): 223-32, 2009.19230772
Braun T, Itzykson R, Renneville A, et al.: Molecular predictors of response to decitabine in advanced chronic myelomonocytic leukemia: a phase 2 trial. Blood 118 (14): 3824-31, 2011.21828134
Drummond MW, Pocock C, Boissinot M, et al.: A multi-centre phase 2 study of azacitidine in chronic myelomonocytic leukaemia. Leukemia 28 (7): 1570-2, 2014.24569776
Tantravahi SK, Szankasi P, Khorashad JS, et al.: A phase II study of the efficacy, safety, and determinants of response to 5-azacitidine (Vidaza®) in patients with chronic myelomonocytic leukemia. Leuk Lymphoma 57 (10): 2441-4, 2016.26752680
Santini V, Allione B, Zini G, et al.: A phase II, multicentre trial of decitabine in higher-risk chronic myelomonocytic leukemia. Leukemia 32 (2): 413-418, 2018.28607470
Coston T, Pophali P, Vallapureddy R, et al.: Suboptimal response rates to hypomethylating agent therapy in chronic myelomonocytic leukemia; a single institutional study of 121 patients. Am J Hematol 94 (7): 767-779, 2019.30964202
Bennett JM: Chronic myelomonocytic leukemia. Curr Treat Options Oncol 3 (3): 221-3, 2002.12057067 22052728
Wattel E, Guerci A, Hecquet B, et al.: A randomized trial of hydroxyurea versus VP16 in adult chronic myelomonocytic leukemia. Groupe Français des Myélodysplasies and European CMML Group. Blood 88 (7): 2480-7, 1996.8839839 96437023
Itzykson R, Santini V, Thepot S, et al.: Decitabine Versus Hydroxyurea for Advanced Proliferative Chronic Myelomonocytic Leukemia: Results of a Randomized Phase III Trial Within the EMSCO Network. J Clin Oncol 41 (10): 1888-1897, 2023.36455187
Montalban-Bravo G, Hammond D, DiNardo CD, et al.: Activity of venetoclax-based therapy in chronic myelomonocytic leukemia. Leukemia 35 (5): 1494-1499, 2021.33846541
Bazinet A, Darbaniyan F, Kadia TM, et al.: A retrospective study of cladribine and low-dose cytarabine-based regimens for the treatment of chronic myelomonocytic leukemia and secondary acute myeloid leukemia. Cancer 129 (4): 560-568, 2023.36458426
Bazinet A, Darbaniyan F, Jabbour E, et al.: Azacitidine plus venetoclax in patients with high-risk myelodysplastic syndromes or chronic myelomonocytic leukaemia: phase 1 results of a single-centre, dose-escalation, dose-expansion, phase 1-2 study. Lancet Haematol 9 (10): e756-e765, 2022.36063832

## Treatment of Juvenile Myelomonocytic Leukemia

For more information, see Juvenile Myelomonocytic Leukemia Treatment.

## Treatment of Atypical Chronic Myeloid Leukemia

### Disease Overview

Atypical chronic myeloid leukemia (aCML) is a leukemic disorder that exhibits both myelodysplastic and myeloproliferative features at the time of diagnosis.

Atypical CML is characterized pathologically by:[1]

- Peripheral blood leukocytosis with increased numbers of mature and immature neutrophils.
- Prominent dysgranulopoiesis.
- No Philadelphia chromosome or BCR::ABL1 fusion gene.
- Neutrophil precursors (e.g., promyelocytes, myelocytes, and metamyelocytes) accounting for more than 10% of white blood cells.
- Minimal absolute basophilia with basophils accounting for less than 2% of white blood cells.
- Absolute monocytosis with monocytes typically account for less than 10% of white blood cells.
- Hypercellular bone marrow with granulocytic proliferation and granulocytic dysplasia.
- Fewer than 20% blasts in the blood or bone marrow.
- Thrombocytopenia.

Clinical features of aCML include:[1-4]

- Anemia. For more information on anemia, see Fatigue.
- Thrombocytopenia.
- Splenomegaly (in 75% of cases).

Although cytogenetic abnormalities are found in as many as 80% of the patients with aCML, none is specific.[1-3,5] No Philadelphia chromosome or BCR::ABL1 fusion gene is present.

The exact incidence of aCML is unknown. The median age at the time of diagnosis of this rare leukemic disorder is in the seventh or eighth decade of life.[1-3]

Morphologically, aCML is characterized by myelodysplasia associated with bone marrow and peripheral blood patterns similar to chronic myeloid leukemia, but cytogenetically it lacks a Philadelphia chromosome or BCR::ABL1 fusion gene.[1] The white blood cell count in the peripheral blood is variable. Median values range from 35 × 10^9^/L to 96 × 10^9^/L, and some patients may have white blood cell counts greater than 300 × 10^9^/L.[1-3,5] Blasts in the peripheral blood typically account for less than 5% of the white blood cells. Immature neutrophils usually total 10% to 20% or more.[1] The percentage of monocytes is rarely more than 10%. Minimal basophilia may be present.[1-3,5] Nuclear abnormalities, such as acquired Pelger-Huët anomaly, may be seen in the neutrophils. Moderate anemia (often showing changes indicative of dyserythropoiesis) and thrombocytopenia are common.[1-4] Bone marrow findings include: [1-3,5]

- Granulocytic hypercellularity.
- Blast count less than 20%.
- Dysgranulopoiesis
- Megakaryocytic dysplasia.
- Erythroid precursors accounting for more than 30% of marrow cells with dyserythropoiesis present (in some cases).

The median survival times for aCML are reported to be less than 20 months, and thrombocytopenia and marked anemia are poor prognostic factors.[1,2] Atypical CML evolves to acute leukemia in approximately 25% to 40% of patients.[1,3] In the remaining patients, fatal complications include resistant leukocytosis, anemia, thrombocytopenia, hepatosplenomegaly, cerebral bleeding associated with thrombocytopenia, and infection.[3,4]

### Treatment Overview

The optimal treatment of aCML is uncertain because of the rare incidence of this chronic leukemic disorder. Treatment with hydroxyurea may lead to short-lived partial remissions of 2 to 4 months in duration.[4] Atypical CML appears to respond poorly to treatment with interferon alfa.[4]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Orazi A, Germing U: The myelodysplastic/myeloproliferative neoplasms: myeloproliferative diseases with dysplastic features. Leukemia 22 (7): 1308-19, 2008.18480833
Hernández JM, del Cañizo MC, Cuneo A, et al.: Clinical, hematological and cytogenetic characteristics of atypical chronic myeloid leukemia. Ann Oncol 11 (4): 441-4, 2000.10847463 20304076
Costello R, Sainty D, Lafage-Pochitaloff M, et al.: Clinical and biological aspects of Philadelphia-negative/BCR-negative chronic myeloid leukemia. Leuk Lymphoma 25 (3-4): 225-32, 1997.9168433 97311718
Kurzrock R, Bueso-Ramos CE, Kantarjian H, et al.: BCR rearrangement-negative chronic myelogenous leukemia revisited. J Clin Oncol 19 (11): 2915-26, 2001.11387365 21281043
Bennett JM, Catovsky D, Daniel MT, et al.: The chronic myeloid leukaemias: guidelines for distinguishing chronic granulocytic, atypical chronic myeloid, and chronic myelomonocytic leukaemia. Proposals by the French-American-British Cooperative Leukaemia Group. Br J Haematol 87 (4): 746-54, 1994.7986717 95078144

## Treatment of MDS/MPN, Unclassifiable

### Disease Overview

Myelodysplastic/myeloproliferative neoplasm, unclassifiable (MDS/MPN-UC) (also known as mixed myeloproliferative/myelodysplastic syndrome, unclassifiable and overlap syndrome, unclassifiable) shows features of both myeloproliferative disease and myelodysplastic disease but does not meet the criteria for any of the other MDS/MPN entities.[1]

Diagnostic criteria for MDS/MPN-UC can be either:[1]

1. The combination of four sets of criteria (a–d):
  a. Clinical, laboratory, and morphologic features of myelodysplastic syndrome (MDS) (e.g., refractory anemia, refractory anemia with ringed sideroblasts, refractory cytopenia with multilineage dysplasia, and refractory anemia with excess of blasts) with fewer than 20% blasts in the blood and bone marrow. For more information on anemia, see Fatigue.
  b. Prominent myeloproliferative features, e.g. platelet count greater than 600 × 10^9^/L associated with megakaryocytic proliferation, or white blood cell count greater than 13.0 × 10^9^/L with or without splenomegaly.
  c. No history of an underlying chronic myeloproliferative disorder (CMPD), MDS, or recent cytotoxic or growth factor therapy that could cause the myelodysplastic or myeloproliferative features.
  d. No Philadelphia chromosome or BCR::ABL1 fusion gene, del(5q), t(3;3)(q21;q26), or inv(3)(q21q26).
2. Mixed myeloproliferative and myelodysplastic features that cannot be assigned to any other category of MDS, CMPD, or MDS/MPN.

Clinical characteristics of MDS/MPN-UC include:
- Features of both MDS and CMPD.
- Hepatomegaly.
- Splenomegaly.

The incidence and etiology of MDS/MPN-UC are unknown.

Laboratory features typically include anemia and dimorphic erythrocytes on the peripheral blood smear.[1] Thrombocytosis (platelet count >600 × 10^9^/L) or leukocytosis (white blood cell count >13 × 10^9^/L) are present. Neutrophils may exhibit dysplastic features, and giant or hypogranular platelets may be present. Blasts make up less than 20% of the white blood cells and of the nucleated cells of the bone marrow. The bone marrow is hypercellular and may exhibit proliferation in any or all of the myeloid lineages. Dysplastic features are present in at least one cell line.[1]

No cytogenetic or molecular findings are available that are specific for MDS/MPN-UC. In one small series, six of nine patients (those with ringed sideroblasts associated with marked thrombocytosis [RARS-T]) showed a JAK2 V617F mutation causing constitutive activation of the JAK2 tyrosine kinase (a mutation also commonly observed in patients with polycythemia vera, essential thrombocythemia, and idiopathic myelofibrosis).[2] Because of its rare occurrence, the prognosis and predictive factors are unknown.[1]

### Treatment Overview

Adult patients with MDS/MPN associated with platelet-derived growth factor receptor gene rearrangements are candidates for imatinib mesylate at standard dosages.[3] Because of its rare occurrence, the literature only minimally addresses other treatment options for MDS/MPN-UC. Supportive care involves treating cytopenias and infection as necessary.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Orazi A, Germing U: The myelodysplastic/myeloproliferative neoplasms: myeloproliferative diseases with dysplastic features. Leukemia 22 (7): 1308-19, 2008.18480833
Szpurka H, Tiu R, Murugesan G, et al.: Refractory anemia with ringed sideroblasts associated with marked thrombocytosis (RARS-T), another myeloproliferative condition characterized by JAK2 V617F mutation. Blood 108 (7): 2173-81, 2006.16741247
GLEEVEC - imatinib mesylate tablet. Novartis Pharmaceuticals Corporation, 2020. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2020/021588s056s057lbl.pdf). Last accessed February 18, 2025.

## Latest Updates to This Summary (05/07/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of myelodysplastic/myeloproliferative neoplasms. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Myelodysplastic/Myeloproliferative Neoplasms Treatment is:

- Aaron Gerds, MD (Cleveland Clinic Taussig Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Myelodysplastic/Myeloproliferative Neoplasms Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/myeloproliferative/hp/mds-mpd-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389321]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).